# Delirium (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of delirium. It is intended as a resource to inform and assist clinicians who care for cancer patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Definition

Delirium is a neuropsychiatric complication that can occur in patients with cancer, particularly in those with advanced disease. The prevention of delirium in the patient with cancer has not been systematically examined, but studies in hospitalized elderly patients suggest that early identification of risk factors reduces the occurrence rate of delirium and the duration of episodes.[1]

Delirium has been defined as a disorder of global cerebral dysfunction characterized by disordered awareness, attention, and cognition.[2] In addition, delirium is associated with behavioral manifestations. The text revision of the fourth edition of the Diagnostic and Statistical Manual for Mental Disorders (DSM-IV-TR) cites the core clinical criteria for diagnosis as follows:[3]

- A disturbance of consciousness with reduced clarity of awareness and attention deficit.
- Other cognitive or perceptual disturbances.
- Acuity of onset (hours to days) and fluctuation over the course of the day.
- The presence of an underlying cause such as a general medical condition (e.g., hypoxia or electrolyte disturbance), medication, a combination of etiologies, or indeterminate etiology.

Other associated noncore clinical criteria features include sleep-wake cycle disturbance, delusions, emotional lability, and disturbance of psychomotor activity. The latter forms the basis of classifying delirium into three different subtypes:[4,5]

1. Hypoactive.
2. Hyperactive.
3. Mixed, with both hypoactive and hyperactive features.

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### References

Inouye SK, Bogardus ST, Charpentier PA, et al.: A multicomponent intervention to prevent delirium in hospitalized older patients. N Engl J Med 340 (9): 669-76, 1999.10053175 99150064
Lipowski ZJ: Delirium in the elderly patient. N Engl J Med 320 (9): 578-82, 1989.2644535 89127446
American Psychiatric Association: Delirium, dementia, and amnestic and other cognitive disorders. In: American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-IV-TR. 4th rev. ed. American Psychiatric Association, 2000, pp 135-80.
Clinical features, course, and outcome. In: Lipowski ZJ: Delirium: Acute Confusional States. Oxford University Press, 1990, pp 54-70.
Camus V, Burtin B, Simeone I, et al.: Factor analysis supports the evidence of existing hyperactive and hypoactive subtypes of delirium. Int J Geriatr Psychiatry 15 (4): 313-6, 2000.10767730 20232097

## Impact of Delirium on Patient, Family, and Health Care Personnel

The clinical presentation of delirium is associated with a high level of distress in patients, family members, and health care personnel.[1-3] Delirium is associated with a high burden of symptom distress, particularly in relation to delusions, perceptual disturbances, and psychomotor agitation. Incontinence, falls, failure to maintain adequate hydration, a prolonged hospital stay, and death are more likely to occur in the patient with delirium.[4-10]

Dysfunctional cognition in the delirious patient hinders communication between patient and family and between patient and health care personnel. As a result, reliable symptom assessment, counseling, and active patient participation in the therapeutic decision-making process are all compromised.[11] Psychomotor agitation and emotional lability in the delirious patient may be misinterpreted as a presentation of increased pain expression.[12] Consequently, conflict over the needed level of analgesia can arise among the patient, family, and staff. A potentially destructive triangle can develop when the patient’s family misinterprets agitation as increased pain and advocates for inappropriate escalation of opioid dosing.[13]

A psychosocial intervention for family caregivers of patients with advanced cancer may be beneficial in providing knowledge of delirium and detection rates and in increasing family caregiver self-confidence in decision making.[14]

### References

Breitbart W, Gibson C, Tremblay A: The delirium experience: delirium recall and delirium-related distress in hospitalized patients with cancer, their spouses/caregivers, and their nurses. Psychosomatics 43 (3): 183-94, 2002 May-Jun.12075033 22070549
Morita T, Hirai K, Sakaguchi Y, et al.: Family-perceived distress from delirium-related symptoms of terminally ill cancer patients. Psychosomatics 45 (2): 107-13, 2004 Mar-Apr.15016923
Cohen MZ, Pace EA, Kaur G, et al.: Delirium in advanced cancer leading to distress in patients and family caregivers. J Palliat Care 25 (3): 164-71, 2009.19824277
Lawlor PG, Gagnon B, Mancini IL, et al.: Occurrence, causes, and outcome of delirium in patients with advanced cancer: a prospective study. Arch Intern Med 160 (6): 786-94, 2000.10737278 20199539
Bruera E, Miller L, McCallion J, et al.: Cognitive failure in patients with terminal cancer: a prospective study. J Pain Symptom Manage 7 (4): 192-5, 1992.1517640 92388767
Hogan DB: Revisiting the O complex: urinary incontinence, delirium and polypharmacy in elderly patients. CMAJ 157 (8): 1071-7, 1997.9347778 98007434
O'Keeffe ST, Lavan JN: Clinical significance of delirium subtypes in older people. Age Ageing 28 (2): 115-9, 1999.10350406 99277909
Lawlor PG: Delirium and dehydration: some fluid for thought? Support Care Cancer 10 (6): 445-54, 2002.12353122 22240291
O'Keeffe S, Lavan J: The prognostic significance of delirium in older hospital patients. J Am Geriatr Soc 45 (2): 174-8, 1997.9033515 97185834
Caraceni A, Nanni O, Maltoni M, et al.: Impact of delirium on the short term prognosis of advanced cancer patients. Italian Multicenter Study Group on Palliative Care. Cancer 89 (5): 1145-9, 2000.10964345 20419775
Lawlor PG, Fainsinger RL, Bruera ED: Delirium at the end of life: critical issues in clinical practice and research. JAMA 284 (19): 2427-9, 2000.11074759 20528562
Gagnon B, Lawlor PG, Mancini IL, et al.: The impact of delirium on the circadian distribution of breakthrough analgesia in advanced cancer patients. J Pain Symptom Manage 22 (4): 826-33, 2001.11576799 21460920
Fainsinger RL, Tapper M, Bruera E: A perspective on the management of delirium in terminally ill patients on a palliative care unit. J Palliat Care 9 (3): 4-8, 1993 Autumn.7903694 94096207
Gagnon P, Charbonneau C, Allard P, et al.: Delirium in advanced cancer: a psychoeducational intervention for family caregivers. J Palliat Care 18 (4): 253-61, 2002 Winter.12611315 22498840

## Incidence and Prevalence

Occurrence rates range from 28% to 48% in patients with advanced cancer on admission to hospital or hospice,[1-3] and approximately 85% to 90% of these patients will experience delirium in the hours to days before death.[3-6] The term acute confusional state has also been used to describe this syndrome; in the last days of life, the condition sometimes referred to as terminal restlessness probably represents a terminal delirium.[7]

Although delirium clearly has a recognized association with the dying phase, many episodes of delirium are reversible; therapeutic intervention can result in delirium reversal, or at least improvement, in 30% to 75% of episodes.[3,5,8-11] Variability in reported occurrence rates and clinical outcomes most likely reflects sampling from different clinical settings or different stages in the clinical trajectory of cancer, in addition to inconsistency in diagnostic terminology.[12]

### References

Minagawa H, Uchitomi Y, Yamawaki S, et al.: Psychiatric morbidity in terminally ill cancer patients. A prospective study. Cancer 78 (5): 1131-7, 1996.8780554 96374263
Pereira J, Hanson J, Bruera E: The frequency and clinical course of cognitive impairment in patients with terminal cancer. Cancer 79 (4): 835-42, 1997.9024722 97177170
Lawlor PG, Gagnon B, Mancini IL, et al.: Occurrence, causes, and outcome of delirium in patients with advanced cancer: a prospective study. Arch Intern Med 160 (6): 786-94, 2000.10737278 20199539
Massie MJ, Holland J, Glass E: Delirium in terminally ill cancer patients. Am J Psychiatry 140 (8): 1048-50, 1983.6869591 83253501
Bruera E, Miller L, McCallion J, et al.: Cognitive failure in patients with terminal cancer: a prospective study. J Pain Symptom Manage 7 (4): 192-5, 1992.1517640 92388767
Breitbart W, Alici Y: Agitation and delirium at the end of life: "We couldn't manage him". JAMA 300 (24): 2898-910, E1, 2008.19109118
Travis SS, Conway J, Daly M, et al.: Terminal restlessness in the nursing facility: assessment, palliation, and symptom management. Geriatr Nurs 22 (6): 308-12, 2001 Nov-Dec.11780004
Gagnon P, Allard P, Mâsse B, et al.: Delirium in terminal cancer: a prospective study using daily screening, early diagnosis, and continuous monitoring. J Pain Symptom Manage 19 (6): 412-26, 2000.10908822 20370892
Maddocks I, Somogyi A, Abbott F, et al.: Attenuation of morphine-induced delirium in palliative care by substitution with infusion of oxycodone. J Pain Symptom Manage 12 (3): 182-9, 1996.8803381 96396261
Tuma R, DeAngelis LM: Altered mental status in patients with cancer. Arch Neurol 57 (12): 1727-31, 2000.11115238 20567115
Breitbart W, Gibson C, Tremblay A: The delirium experience: delirium recall and delirium-related distress in hospitalized patients with cancer, their spouses/caregivers, and their nurses. Psychosomatics 43 (3): 183-94, 2002 May-Jun.12075033 22070549
Lawlor PG: The panorama of opioid-related cognitive dysfunction in patients with cancer: a critical literature appraisal. Cancer 94 (6): 1836-53, 2002.11920548 21916639

## Etiology of Delirium

Delirium is often multifactorial, especially in the setting of advanced cancer. General etiologic factors include the following:[1-10]

- Indirect central nervous system effects related to systemic complications of cancer such as organ failure (e.g., hepatic or renal failure), metabolic or electrolyte disturbance (e.g., hypoglycemia, hypercalcemia, hyponatremia, or dehydration), infection, and paraneoplastic syndromes (e.g., bulbar encephalitis).[11]
- Exogenous substances such as the wide variety of medications and treatments used in these patients, including most of the commonly used chemotherapeutic agents,[12-19] bone marrow or stem cell transplantation, biological response modifiers (e.g., interleukin and interferon), glucocorticoids, and especially psychoactive agents such as opioid analgesics, antidepressants, benzodiazepines, antihistamines, and other sedating agents.
- Withdrawal phenomena associated with substances such as alcohol and benzodiazepines.

Despite the very limited systematic study of risk factors for delirium in patients with cancer, risk factors have been identified in hospitalized elderly patients (some of them with cancer) and include the following:[20-22]

- Severe illness.
- Level of comorbidity.
- Advanced age.
- Prior dementia.
- Hypoalbuminemia.
- Infection.
- Azotemia.
- Psychoactive medications.

Studies of hospitalized elderly patients suggest that the level of risk is proportionate to the number of risk factors present.[23] Cancer is particularly prevalent in the elderly population. Many patients with cancer, particularly those with advanced disease, are likely to have a high level of baseline vulnerability. Such vulnerability leaves them predisposed to precipitants such as psychoactive medications.[24] It is also likely that the predictors of poor pain control in cancer patients (neuropathic pain, incidental pain, opioid tolerance, somatization, and a history of drug or alcohol abuse) result in higher opioid doses and thereby increase the risk of delirium.[25]

Distinct from delirium, older (65 years or older), long-term (>5 years) cancer survivors are also at increased risk of cognitive deficits and possibly dementia, as noted in a co-twin control design study of 702 Swedish cancer survivors.[10]

### References

Lawlor PG, Gagnon B, Mancini IL, et al.: Occurrence, causes, and outcome of delirium in patients with advanced cancer: a prospective study. Arch Intern Med 160 (6): 786-94, 2000.10737278 20199539
Agostini JV, Leo-Summers LS, Inouye SK: Cognitive and other adverse effects of diphenhydramine use in hospitalized older patients. Arch Intern Med 161 (17): 2091-7, 2001 Sep 24.11570937 21455064
Fann JR, Roth-Roemer S, Burington BE, et al.: Delirium in patients undergoing hematopoietic stem cell transplantation. Cancer 95 (9): 1971-81, 2002.12404292 22291487
Prieto JM, Blanch J, Atala J, et al.: Psychiatric morbidity and impact on hospital length of stay among hematologic cancer patients receiving stem-cell transplantation. J Clin Oncol 20 (7): 1907-17, 2002.11919251 21917889
Morita T, Tei Y, Tsunoda J, et al.: Underlying pathologies and their associations with clinical features in terminal delirium of cancer patients. J Pain Symptom Manage 22 (6): 997-1006, 2001.11738162 21602369
Morita T, Tei Y, Tsunoda J, et al.: Increased plasma morphine metabolites in terminally ill cancer patients with delirium: an intra-individual comparison. J Pain Symptom Manage 23 (2): 107-13, 2002.11844630 21833644
van Steijn JH, Nieboer P, Hospers GA, et al.: Delirium after interleukin-2 and alpha-interferon therapy for renal cell carcinoma. Anticancer Res 21 (5): 3699-700, 2001 Sep-Oct.11848546 21837077
Walker LG, Walker MB, Heys SD, et al.: The psychological and psychiatric effects of rIL-2 therapy: a controlled clinical trial. Psychooncology 6 (4): 290-301, 1997.9451748 98113717
Meyers CA, Albitar M, Estey E: Cognitive impairment, fatigue, and cytokine levels in patients with acute myelogenous leukemia or myelodysplastic syndrome. Cancer 104 (4): 788-93, 2005.15973668
Heflin LH, Meyerowitz BE, Hall P, et al.: Cancer as a risk factor for long-term cognitive deficits and dementia. J Natl Cancer Inst 97 (11): 854-6, 2005.15928306
Paraneoplastic syndromes. In: Posner JB: Neurologic Complications of Cancer. FA Davis, 1995, pp 353-85.
Eberhardt B, Dilger S, Musial F, et al.: Short-term monitoring of cognitive functions before and during the first course of treatment. J Cancer Res Clin Oncol 132 (4): 234-40, 2006.16416107
Hermelink K, Untch M, Lux MP, et al.: Cognitive function during neoadjuvant chemotherapy for breast cancer: results of a prospective, multicenter, longitudinal study. Cancer 109 (9): 1905-13, 2007.17351951
Nelson CJ, Nandy N, Roth AJ: Chemotherapy and cognitive deficits: mechanisms, findings, and potential interventions. Palliat Support Care 5 (3): 273-80, 2007.17969831
Taillibert S, Voillery D, Bernard-Marty C: Chemobrain: is systemic chemotherapy neurotoxic? Curr Opin Oncol 19 (6): 623-7, 2007.17906463
Bender CM, Sereika SM, Brufsky AM, et al.: Memory impairments with adjuvant anastrozole versus tamoxifen in women with early-stage breast cancer. Menopause 14 (6): 995-8, 2007 Nov-Dec.17898668
Stewart A, Collins B, Mackenzie J, et al.: The cognitive effects of adjuvant chemotherapy in early stage breast cancer: a prospective study. Psychooncology 17 (2): 122-30, 2008.17518411
Chang EL, Wefel JS, Hess KR, et al.: Neurocognition in patients with brain metastases treated with radiosurgery or radiosurgery plus whole-brain irradiation: a randomised controlled trial. Lancet Oncol 10 (11): 1037-44, 2009.19801201
Ahles TA, Saykin AJ, McDonald BC, et al.: Longitudinal assessment of cognitive changes associated with adjuvant treatment for breast cancer: impact of age and cognitive reserve. J Clin Oncol 28 (29): 4434-40, 2010.20837957
Schor JD, Levkoff SE, Lipsitz LA, et al.: Risk factors for delirium in hospitalized elderly. JAMA 267 (6): 827-31, 1992.1732655 92122439
O'Keeffe ST, Lavan JN: Predicting delirium in elderly patients: development and validation of a risk-stratification model. Age Ageing 25 (4): 317-21, 1996.8831879 96428777
Elie M, Cole MG, Primeau FJ, et al.: Delirium risk factors in elderly hospitalized patients. J Gen Intern Med 13 (3): 204-12, 1998.9541379 98200452
Inouye SK, Charpentier PA: Precipitating factors for delirium in hospitalized elderly persons. Predictive model and interrelationship with baseline vulnerability. JAMA 275 (11): 852-7, 1996.8596223 96173828
Casarett DJ, Inouye SK; American College of Physicians-American Society of Internal Medicine End-of-Life Care Consensus Panel: Diagnosis and management of delirium near the end of life. Ann Intern Med 135 (1): 32-40, 2001.11434730 21328558
Fainsinger RL, Nekolaichuk CL, Lawlor PG, et al.: A multicenter study of the revised Edmonton Staging System for classifying cancer pain in advanced cancer patients. J Pain Symptom Manage 29 (3): 224-37, 2005.15781173

## Assessment, Diagnosis, and Monitoring

The diagnosis of delirium should be considered for any patient with cancer demonstrating the following:

- An acute onset of agitation or uncooperative behavior.
- A personality change.
- Impaired cognitive functioning.
- Altered attention span.
- Fluctuating level of consciousness.
- Uncharacteristic anxiety or depression.

However, the diagnoses of delirium and cognitive impairment are frequently missed and poorly documented.[1-5]

Medical and nursing staff, as well as family members, may attribute a functional cause to some of the early, prodromal, and more subtle signs of delirium such as increased anxiety, restlessness, and emotional lability.[6] Failure to recognize delirium is particularly likely if the patient is encountered in a transient lucid phase, which can commonly occur as part of the fluctuating nature of delirium.[7] Delirium is most frequently misdiagnosed as depression or dementia.[7-10] The hypoactive subtype is considered especially likely to be misdiagnosed as depression.[7]

Differentiating delirium from dementia or recognizing delirium superimposed on dementia can be difficult because of some shared clinical features such as disorientation and impairment of memory, thinking, and judgment.[11-13] However, dementia typically appears in relatively alert individuals; disturbance of consciousness is not a common feature. The temporal onset of symptoms of delirium is acute (hours to days), not insidious (months to years) as in dementia.[14] In elderly patients with cancer, delirium is often superimposed on dementia, giving rise to a particularly difficult diagnostic challenge. In this situation, the diagnosis may become more apparent when delirium fails to reverse or when some features of delirium, especially cognitive impairment, persist. Dementia is often then the most likely explanation for a persistent or residual cognitive deficit.[14]

Vigilance on the part of nursing staff and a systematic approach to recording serial observations assist in the detection of delirium. Regular cognitive screening facilitates the diagnosis of delirium in cancer patients.[15]

Instruments that have favorable psychometric properties and are brief enough to allow repeated administration in cancer patients include the following:[16-21]

- The Mini-Mental State Examination (MMSE) screens for cognitive impairment and requires active patient participation in assessment.
- The Blessed Orientation Memory and Concentration Test (BOMC) screens for cognitive impairment and requires active patient participation in assessment.
- The Confusion Assessment Method (CAM) screens for cognitive impairment but does not require formal patient participation.
- The Bedside Confusion Scale requires active patient participation and is remarkably brief; its psychometric potential as a screening instrument compares favorably with the CAM.
- The Memorial Delirium Assessment Scale (MDAS) has been validated as having diagnostic and severity rating potential. This scale allows prorating of scores when a patient cannot actively participate in testing for reasons such as dyspnea or fatigue.
- The Delirium Rating Scale-Revised-98 has been validated as having diagnostic and severity rating potential.

### References

McCartney JR, Palmateer LM: Assessment of cognitive deficit in geriatric patients. A study of physician behavior. J Am Geriatr Soc 33 (7): 467-71, 1985.4008844 85235361
Harwood DM, Hope T, Jacoby R: Cognitive impairment in medical inpatients. II: Do physicians miss cognitive impairment? Age Ageing 26 (1): 37-9, 1997.9143436 97288458
Hustey FM, Meldon SW: The prevalence and documentation of impaired mental status in elderly emergency department patients. Ann Emerg Med 39 (3): 248-53, 2002.11867976 21855840
Rincon HG, Granados M, Unutzer J, et al.: Prevalence, detection and treatment of anxiety, depression, and delirium in the adult critical care unit. Psychosomatics 42 (5): 391-6, 2001 Sep-Oct.11739905 21605345
Inouye SK, Foreman MD, Mion LC, et al.: Nurses' recognition of delirium and its symptoms: comparison of nurse and researcher ratings. Arch Intern Med 161 (20): 2467-73, 2001.11700159 21556899
Breitbart W, Chochinov HM, Passik S: Psychiatric aspects of palliative care. In: Doyle D, Hanks GW, MacDonald N, eds.: Oxford Textbook of Palliative Medicine. Oxford University Press, 1998, pp 933-56.
Inouye SK: The dilemma of delirium: clinical and research controversies regarding diagnosis and evaluation of delirium in hospitalized elderly medical patients. Am J Med 97 (3): 278-88, 1994.8092177 94379068
Nicholas LM, Lindsey BA: Delirium presenting with symptoms of depression. Psychosomatics 36 (5): 471-9, 1995 Sep-Oct.7568655 96024280
Farrell KR, Ganzini L: Misdiagnosing delirium as depression in medically ill elderly patients. Arch Intern Med 155 (22): 2459-64, 1995 Dec 11-25.7503605 96094914
Armstrong SC, Cozza KL, Watanabe KS: The misdiagnosis of delirium. Psychosomatics 38 (5): 433-9, 1997 Sep-Oct.9314712 97460298
Fick D, Foreman M: Consequences of not recognizing delirium superimposed on dementia in hospitalized elderly individuals. J Gerontol Nurs 26 (1): 30-40, 2000.10776167 20238467
Johnson J, Sims R, Gottlieb G: Differential diagnosis of dementia, delirium and depression. Implications for drug therapy. Drugs Aging 5 (6): 431-45, 1994.7858369 95161874
Cole MG, McCusker J, Dendukuri N, et al.: Symptoms of delirium among elderly medical inpatients with or without dementia. J Neuropsychiatry Clin Neurosci 14 (2): 167-75, 2002 Spring.11983791 21979889
Lipowski ZJ: Delirium in the elderly patient. N Engl J Med 320 (9): 578-82, 1989.2644535 89127446
Bruera E, Miller L, McCallion J, et al.: Cognitive failure in patients with terminal cancer: a prospective study. J Pain Symptom Manage 7 (4): 192-5, 1992.1517640 92388767
Folstein MF, Folstein SE, McHugh PR: "Mini-mental state". A practical method for grading the cognitive state of patients for the clinician. J Psychiatr Res 12 (3): 189-98, 1975.1202204 76071605
Inouye SK, van Dyck CH, Alessi CA, et al.: Clarifying confusion: the confusion assessment method. A new method for detection of delirium. Ann Intern Med 113 (12): 941-8, 1990.2240918 91052813
Katzman R, Brown T, Fuld P, et al.: Validation of a short Orientation-Memory-Concentration Test of cognitive impairment. Am J Psychiatry 140 (6): 734-9, 1983.6846631 83201710
Stillman MJ, Rybicki LA: The bedside confusion scale: development of a portable bedside test for confusion and its application to the palliative medicine population. J Palliat Med 3 (4): 449-56, 2000.
Trzepacz PT, Mittal D, Torres R, et al.: Validation of the Delirium Rating Scale-revised-98: comparison with the delirium rating scale and the cognitive test for delirium. J Neuropsychiatry Clin Neurosci 13 (2): 229-42, 2001 Spring.11449030 21342193
Breitbart W, Rosenfeld B, Roth A, et al.: The Memorial Delirium Assessment Scale. J Pain Symptom Manage 13 (3): 128-37, 1997.9114631 97269575

## General Management Approach to Delirium

An integrated approach to management involves educating family members about the nature of the delirium syndrome and its potential treatment.[1-3] Family concerns, particularly the misinterpretation of symptoms such as agitation, emotional lability, and disinhibition, must be addressed. Depending on the clinical circumstances, guarded optimism regarding reversibility can be expressed. On the basis of discussion with family members, a consensus is then reached on the goals of care; this, in turn, will determine the desired and appropriate level of assessment and therapeutic intervention, which could be directed at identifying and treating underlying precipitants to reverse or improve delirium.[2] The extent of assessment will likely be influenced by the clinical setting, disease variables, and level of distress. It may therefore be appropriate in some situations to forego further assessment and focus solely on symptomatic treatment.

Regardless of the level of investigational or therapeutic aggression, symptomatic treatment is usually required for most patients. Monitoring and reassessment should be ongoing, particularly when pharmacological sedation is required to initially control symptoms.[4]

### Nonpharmacologic Aspects of Symptom Management

Various environmental strategies have been proposed to reduce the symptomatic distress associated with delirium. These strategies include the following discrete efforts at reorientation:[5-7]

- A well-lit room with familiar objects.
- A visible clock or calendar.
- Limited staff changes (and possibly one-on-one nursing care).
- Reduced noise stimulation.
- The presence of family.

Although some controversy surrounds the use of physical restraints, their judicious use may sometimes be necessary to prevent self-harm or physical aggression directed at caregivers.

### Identification of Underlying Causes and Their Treatment

Delirium reversal is consistent with the goals of care; therefore, the standard management approach in patients with cancer is to search for and treat the reversible precipitants of delirium.[1,2] Although patients with cancer generally have a high level of baseline vulnerability to the development of delirium (owing to factors such as cachexia, hypoalbuminemia, advanced age, and prior dementia), the greatest therapeutic benefit is more likely to be derived from identifying and treating superimposed precipitants with relatively low-burden interventions such as the following:[8-10]

- Discontinuation or dose reduction of psychoactive medications.
- Subcutaneous fluid administration via hypodermoclysis to treat dehydration.
- Intravenous or subcutaneous bisphosphonate treatment of hypercalcemia.
- Oral or intravenous antibiotics to treat infection.

This process typically involves a careful history and physical examination in addition to basic laboratory tests and imaging.[7] If no obvious precipitant is identified in preliminary searching, the decision to proceed with more invasive or elaborate tests is mainly determined by the goals of care.

Opioid analgesics, required for most patients with advanced disease, are among the psychoactive agents that precipitate delirium most frequently.[9,11] A prospective cohort study in an oncology inpatient population (n = 114) demonstrated that patients exposed to daily oral opioid doses higher than 90 mg of morphine or morphine equivalents were at significantly higher risk of developing delirium. These results are still significant when controlling for the effects of corticosteroids, benzodiazepines, and other psychotropic medications. However, this study did not provide enough data (on comorbidities, laboratory values, etc.) to determine which patients specifically were at risk for delirium when exposed to more than 90 mg of opioids per day.[12]

Patients with delirium should be assessed for other symptoms that suggest opioid neurotoxicity, for example, tactile hallucinations, agitation, myoclonus, allodynia, hyperalgesia, and possibly seizures. It is postulated that this toxic state relates to the accumulation of the parent opioid compound or its metabolites.[11,13] Intervention in the form of dose reduction or opioid switching in association with assisted hydration typically allows for clearing of the offending opioid or its metabolites.

On identifying opioid toxicity, therefore, it is important to search for other precipitants such as dehydration or infection.[14] A common clinical scenario consists of a patient with infection who may become drowsy, take less fluid, become dehydrated, and then exhibit signs of opioid toxicity, including delirium. Therapeutic intervention should target the triad of precipitants in this scenario. (Refer to the Opioid rotation section in the Opioids section of the PDQ summary on Cancer Pain for more information.)

### Symptomatic Management: The Role of Pharmacologic Agents

No pharmacological treatment has been approved by the U.S. Food and Drug Administration (FDA) for the treatment of delirium. Evidence and clinical experience suggest that antipsychotics play a major role in the treatment of delirium; however, only a few of these studies were conducted in patients with cancer. Antipsychotics are antidopaminergic agents and include typical antipsychotics such as haloperidol [7] and the newer atypical antipsychotic agents such as olanzapine, risperidone, and quetiapine.[15,16];[17][Level of evidence: I]

All antipsychotics presumably work by blocking the postsynaptic dopamine receptors, primarily in the mesolimbic region. However, simultaneous blockade of striatal dopamine receptors by these agents can cause extrapyramidal side effects (EPS) such as abnormal involuntary movements, akathisia, parkinsonian symptoms, and cogwheeling. The typical antipsychotics such as haloperidol carry a higher risk of EPS. The newer atypical antipsychotics have additional effects on the serotonin system that help reduce the EPS.

Antipsychotics have a complex mechanism of action with effects on several other neurotransmitter systems. Atypical antipsychotics have been associated with higher risk of weight gain and metabolic issues because of these effects on other neurotransmitter systems. All antipsychotics have been associated with anticholinergic side effects and negative effects on the cardiovascular and cerebrovascular systems, depending on the medication and dosing used.

#### Haloperidol

Haloperidol, a neuroleptic agent with potent antidopaminergic properties, is still considered the drug of choice for the treatment of delirium in the patient with cancer;[1,7] however, the evidence remains limited. A double-blind trial of haloperidol, chlorpromazine, and lorazepam in the treatment of hospitalized patients with delirium and acquired immunodeficiency syndrome suggested that haloperidol and chlorpromazine were equivalent in efficacy, and both were associated with a low prevalence of EPS. Lorazepam, however, was ineffective and associated with adverse effects, resulting in early closure of this arm of the protocol.[18][Level of evidence: I] The optimal dose range of haloperidol for patients with delirium has not been determined. Consensus guidelines recommended initial doses in the range of 1 to 2 mg every 2 to 4 hours as needed and lower starting doses, such as 0.5 mg every 4 hours as needed, in elderly patients.[7]

Haloperidol can be administered orally, intravenously, subcutaneously, or intramuscularly. Parenteral doses are roughly twice as potent as oral doses. Peak plasma concentrations are achieved 2 to 4 hours after an oral dose, and measurable plasma concentrations occur 15 to 30 minutes after intramuscular administration. Haloperidol may cause fewer EPS when administered intravenously. The EPS can be treated with agents such as benztropine in doses of 1 to 2 mg once or twice a day. Neuroleptic malignant syndrome, a rare complication with haloperidol use, is characterized by hyperthermia, increased mental confusion, leukocytosis, muscular rigidity, myoglobinuria, and high serum creatine phosphokinase. Injectable haloperidol is approved by the FDA only for intramuscular administration. However, it is frequently administered intravenously to treat agitated delirium.

Intravenous administration and higher doses of haloperidol have been associated with risk of sudden death due to Torsades de Pointes (TdP) and QTc prolongation. In this context, an FDA alert raised concerns about intravenous use of haloperidol.[19] The updated labeling of haloperidol includes a strong warning about the TdP and QTc prolongation issues, especially in patients with specific cardiovascular risk factors, and recommends consideration of alternative agents. The FDA alert also recommends extreme caution and close electrocardiogram monitoring if haloperidol is administered intravenously. The FDA alert is based on case reports and small case-control studies. There are no randomized studies investigating this issue, and the data from case reports and case-control studies are confounded by multiple factors (e.g., comorbid conditions and other agents known to cause QTc prolongation).[20]

Evidence suggests that QTc prolongation and TdP might be primarily associated with higher haloperidol doses (6 mg or higher). No cases of QTc prolongation or TdP have been reported with a cumulative intravenous dose smaller than 2 mg. The presence of certain risk factors might increase the risk of QTc prolongation and TdP. Major risk factors include the following:

- Pre-existing heart disease.
- Electrolyte imbalance.
- Concomitant pro-arrhythmic agents and other agents affecting cardiac function.
- Mechanical ventilation.
- High baseline QTc (>450 msec).

Elderly patients, female patients, and patients with endocrine disorders (e.g., diabetes) may carry a higher risk of QTc and TdP. In patients with cancer, special attention should be paid to past or concomitant use of cardiotoxic chemotherapy regimens such as anthracycline-based regimens. Baseline and continuous ECG monitoring is recommended in patients receiving high doses of haloperidol and/or with known risk factors for developing QTc prolongation. Many of the alternatives (i.e., currently available typical and atypical antipsychotics) are also associated with QTc prolongation and TdP.[20]

In select cases, the risk-benefit equation might favor intravenous use of haloperidol, especially in patients with established intravenous access; in addition, no other currently available antipsychotics can be delivered intravenously. Before the newer atypical antipsychotics became available, chlorpromazine was considered an alternative to haloperidol, although it is associated with orthostatic hypotension and a greater level of sedation.

#### Atypical antipsychotics

Among the atypical antipsychotics, olanzapine has been studied more extensively. In an open trial of 79 hospitalized cancer patients with delirium,[17] an oral formulation was used, with an initial dose range of 2.5 to 10 mg and a mean of 3 mg per dose in two daily doses. Seventy-six percent of patients had complete resolution of their delirium while taking olanzapine. No patients experienced EPS, but 30% experienced sedation, which was usually not severe enough to discontinue treatment.

Predictors of a poor response included the following:

- Age older than 70 years.
- History of dementia.
- Central nervous system involvement with cancer.
- Hypoxia.
- Hypoactive subtype.
- Delirium of severe intensity.

Olanzapine is also reported to have antiemetic and possibly analgesic properties, although it is not used primarily for these indications.[21][Level of evidence: II]

Risperidone, another atypical antipsychotic, is also used extensively to treat delirium in clinical practice. In a single-blind randomized trial, the effectiveness of risperidone (n = 17) was compared with that of olanzapine (n = 15) for the treatment of delirium in patients with cancer. Both groups showed significant improvement in delirium as assessed by the Delirium Rating Scale. The response rates for improvement did not differ between the two groups. At the last observation, the mean dose of risperidone was 0.9 mg per day and that of olanzapine was 2.4 mg per day.[22] Risperidone is available in oral tablet and liquid formulations; dosing begins at 0.5 to 1 mg per day in two divided daily doses that are titrated, if necessary, to a total daily dose of 4 to 6 mg per day.

Other atypical antipsychotics—specifically, quetiapine [23] and aripiprazole [24]—have limited evidence in the treatment of delirium. The lack of an available parenteral formulation for any of the atypical antipsychotics is a disadvantage, especially in the context of agitated delirium.

#### Benzodiazepines

Except for lorazepam and midazolam in selected situations, benzodiazepines are generally not recommended for the treatment of delirium.[7] Lorazepam is a short-acting agent, and its use is largely reserved for the treatment of alcohol or benzodiazepine withdrawal. Lorazepam (0.5–1 mg orally or parenterally, every 1–2 hours) has also been used along with haloperidol in patients with delirium who are particularly sensitive to EPS.

Another exception is midazolam, a very short-acting benzodiazepine, which is given by continuous subcutaneous or intravenous infusion in doses ranging from 30 to 100 mg over 24 hours. Midazolam is used to achieve deep sedation, especially in a terminal hyperactive or mixed delirium when agitation is refractory to other treatments, for example, doses of haloperidol in the region of 20 mg per day.

The decision to use a deep level of pharmacologically induced sedation in the treatment of agitated delirium often raises ethical concerns, fueled by the marked variability in the reported frequency (ranging from 10% to 52%) for this practice in patients dying from advanced cancer. Consistent with the goals of care, it is important that appropriate efforts are made to assess the reversibility of delirium, clarify the intent of sedation (the relief of refractory symptoms), and maintain clear communication with family members and health care team members regarding rationale and process.[2,4] (Refer to the Sedation for Refractory Delirium and Other Intractable Symptoms section of this summary for more information.)

#### Psychostimulants

Some preliminary evidence suggests that the hypoactive subtype of delirium is less responsive to neuroleptic treatment.[17] Although psychostimulants have been proposed for the treatment of hypoactive delirium,[25][Level of evidence: III];[26][Level of evidence: II] little empirical evidence attests to their benefit. In a prospective clinical study of 14 patients with advanced cancer and hypoactive delirium, patients demonstrated improvement in cognitive function after receiving 20 to 50 mg of methylphenidate hydrochloride per day.[27][Level of evidence: III] Relatively higher doses of stimulants (>10 mg of methylphenidate) should be used with caution in delirious patients because such doses can contribute to the unmasking of paranoia and confusion and can lead to agitation. Clinical experience suggests that psychostimulants should be avoided in the presence of hallucinations or delusions.[2]

### Sedation for Refractory Delirium and Other Intractable Symptoms

Delirium at the end of life often requires a pharmacological sedative approach. This issue cannot be considered in isolation from the ethical dilemma that it evokes. The need to sedate terminally ill patients for poorly controlled symptoms that include delirium, pain, dyspnea, and psychological effects has been reported frequently.[28-31];[32,33][Level of evidence: III] Although clinical experience suggests that good palliative care can effectively manage the symptoms of most cancer patients, patients may experience symptoms that can be termed “refractory.”[34] Although sedative drugs are a therapeutic option, the incidence of these refractory situations in advanced cancer patients is controversial. This highlights the need to distinguish between “difficult” and “refractory” symptoms. A clear understanding of the terminology describing sedation and sedative medications is necessary; however, the extent to which sedation has been used for managing agitated delirium is difficult to clarify because of inconsistent definitions and confusing terminology.[35,36] Nevertheless, agitated behavior requiring sedation that is variously described as delirium, terminal restlessness, mental anguish, and agitation is a recurring theme in the literature.[37]

A systematic review of the definitions of sedation for symptom relief noted a marked variation in the literature.[36] A sedation definition was proposed to include two core factors:

- Presence of severe suffering refractory to standard palliative management.
- Use of sedative medications with the primary aim of relieving distress.

This review defined palliative sedation as “the use of sedative medications to relieve intolerable and refractory distress by the reduction in patient consciousness.” The identified inconsistencies in the definition of sedation (i.e., primary versus secondary, light versus deep, and intermittent versus continuous sedation) should be subcategories of palliative sedation.[36]

The use of palliative sedation for psychosocial and existential symptoms can be particularly controversial. Many ethical and clinical questions can arise for the clinician—questions that are more easily resolved in the case of palliative sedation for pain and physical symptoms.

For example, the ethical basis for the use of terminal sedation (double effect) is less clearly applicable in the case of psychiatric symptoms. Under this principle, the intended effect (relieving psychological suffering) would be considered allowable as long as any risks or negative effects (i.e., shortened survival) are unintended by the professional. Difficulty arises here because the principle discusses only the professional’s intention, when it is the patient’s intention that can be unclear and potentially problematic. Questions that can arise for clinicians include the following:

- Is the depressed patient who no longer wants to suffer depressive symptoms asking only for that relief, or is it also the patient's intent to ask the professional to shorten his or her life?
  Clinicians who feel uncomfortable in such situations might want to seek guidance from their ethics committees. Other difficult questions can arise from the potentially negative value that is culturally assigned to “zoning out” as a lower form of coping.
- Should the anxious patient who no longer wants to face the anxiety associated with the end of life and desires sedation be encouraged to work through such issues? Or is it allowable for the anxiety of such patients to be handled with sedation?
- How many alternatives should be tried before anxiety is considered unacceptable?

When dealing with such requests, professionals should consider their own cultural and religious biases and the cultural and/or religious backgrounds of patients and their families.

Few studies detail the use of terminal sedation for psychiatric symptoms. Four palliative care programs in Israel, South Africa, and Spain participated in one survey.[38][Level of evidence: III] One unique study has described the Japanese palliative care experience around these issues.[39,40][Level of evidence: II]

Noting the limitations of surveys and retrospective chart reviews,[41,42] researchers have completed prospective studies to determine the use of sedation for uncontrolled symptoms in terminally ill patients. Four palliative care programs with inpatient units in Israel, South Africa, and Spain reported that 97 out of 387 patients (25%) required sedation.[38] In 59 of the 97 patients (60%), sedation was used for refractory delirium, with midazolam being the most common medication prescribed. A study of similar design in Canada reported that 80% of 150 patients developed delirium prior to death.[43] Of the 150 patients, 9 required sedation for refractory delirium. A retrospective study at the MD Anderson Cancer Center in Houston included 1,207 patients admitted to the palliative care unit. Palliative sedation was used in 15% of admissions. The most common indications were delirium (82%) and dyspnea (6%). Sedation in these circumstances is often used on a temporary basis and was reversible in 23% of this group of patients.[44] An Italian study of 2,033 patients showed that 83 patients required palliative sedation, most frequently for dyspnea (37%) and delirium (31%).[45][Level of evidence: III]

The relatively short period between onset of sedation and death has been consistently reported as 1 to 6 days.[37] It has been noted, however, that palliative care patients who have delirium and appear extremely ill may still have treatable, reversible complications.[46-49]

Various medications have been utilized for palliative sedation.[50,51] These include the following:

- Benzodiazepines (midazolam).
- Phenothiazines (chlorpromazine).
- Butyrophenones (haloperidol).
- Anaesthetic agents (propofol).
- Barbiturates.

Midazolam is the drug most frequently reported as useful because of its rapid onset and ease of titration. Choice of medication is often determined by clinician preference and/or institutional policy.

Given the common association between delirium and sedation, it is important to have some understanding of the extensive literature on the ethical validity of using sedation management.[37] Numerous articles have addressed the importance of the double-effect argument as applied to the practice of sedation in palliative care. The concept of the double effect distinguishes between the compelling primary intent to relieve suffering and the unavoidable consequence of potentially accelerating death.[37] Legal opinions tend to support the doctrine of double effect as a major ethical foundation for the distinction between palliative care and euthanasia.[52] One study proposed physician intent, proportionality, and autonomy as the ethical principles relevant to palliative sedation therapy. A prospective study of 102 palliative care patients in 21 (out of 56) palliative care units in Japan found that these principles were generally followed when continuous deep palliative sedation therapy was used, supporting the ethical validity of these decisions.[39] The following principles have been recommended as a decision-making guide for sedation for refractory delirium:[37,53,54]

1. The designation of a refractory problem should follow repeat assessments by skilled clinicians familiar with palliative care. Appropriate assessment and management should be completed in the context of a relationship with the patient and family. Other palliative care clinicians should be consulted if necessary.
2. The need for a sedative management approach should ideally be evaluated during a team conference to avoid individual clinician bias or burnout.
3. If sedation is considered appropriate and reasonable, temporary sedation should be considered.
4. A multidisciplinary assessment of the family should ensure that their views are adequately assessed and understood.

Some families may need continuous information and professional guidance when palliative sedation is used, and this need increases with the duration of the sedation. Individuals or groups outside the family and health care team may have strong opinions about palliative sedation and may offer unsolicited guidance that conflicts with what the patient desires. Concerns identified in a study conducted in The Netherlands relate to the following:[55]

- Aim of continuous sedation.
- Patient well-being.
- Family well-being.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/about-cancer/treatment/clinical-trials/advanced-search) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/about-cancer/treatment/clinical-trials/) about clinical trials is also available.

### References

Breitbart W, Chochinov HM, Passik S: Psychiatric aspects of palliative care. In: Doyle D, Hanks GW, MacDonald N, eds.: Oxford Textbook of Palliative Medicine. Oxford University Press, 1998, pp 933-56.
Lawlor PG, Fainsinger RL, Bruera ED: Delirium at the end of life: critical issues in clinical practice and research. JAMA 284 (19): 2427-9, 2000.11074759 20528562
Gagnon P, Charbonneau C, Allard P, et al.: Delirium in advanced cancer: a psychoeducational intervention for family caregivers. J Palliat Care 18 (4): 253-61, 2002 Winter.12611315 22498840
Lawlor PG, Bruera ED: Delirium in patients with advanced cancer. Hematol Oncol Clin North Am 16 (3): 701-14, 2002.12170576 22161069
McCusker J, Cole M, Abrahamowicz M, et al.: Environmental risk factors for delirium in hospitalized older people. J Am Geriatr Soc 49 (10): 1327-34, 2001.11890491 21887346
Meagher DJ, O'Hanlon D, O'Mahony E, et al.: The use of environmental strategies and psychotropic medication in the management of delirium. Br J Psychiatry 168 (4): 512-5, 1996.8730950 96292694
Practice guideline for the treatment of patients with delirium. American Psychiatric Association. Am J Psychiatry 156 (5 Suppl): 1-20, 1999.10327941 99259925
Gaudreau JD, Gagnon P, Harel F, et al.: Psychoactive medications and risk of delirium in hospitalized cancer patients. J Clin Oncol 23 (27): 6712-8, 2005.16170179
Lawlor PG, Gagnon B, Mancini IL, et al.: Occurrence, causes, and outcome of delirium in patients with advanced cancer: a prospective study. Arch Intern Med 160 (6): 786-94, 2000.10737278 20199539
Sagawa R, Akechi T, Okuyama T, et al.: Etiologies of delirium and their relationship to reversibility and motor subtype in cancer patients. Jpn J Clin Oncol 39 (3): 175-82, 2009.19193654
Lawlor PG: The panorama of opioid-related cognitive dysfunction in patients with cancer: a critical literature appraisal. Cancer 94 (6): 1836-53, 2002.11920548 21916639
Gaudreau JD, Gagnon P, Roy MA, et al.: Opioid medications and longitudinal risk of delirium in hospitalized cancer patients. Cancer 109 (11): 2365-73, 2007.17469164
Morita T, Tei Y, Tsunoda J, et al.: Increased plasma morphine metabolites in terminally ill cancer patients with delirium: an intra-individual comparison. J Pain Symptom Manage 23 (2): 107-13, 2002.11844630 21833644
Lawlor PG: Delirium and dehydration: some fluid for thought? Support Care Cancer 10 (6): 445-54, 2002.12353122 22240291
Adityanjee, Schulz SC: Clinical use of quetiapine in disease states other than schizophrenia. J Clin Psychiatry 63 (Suppl 13): 32-8, 2002.12562145 22449171
Tune L: The role of antipsychotics in treating delirium. Curr Psychiatry Rep 4 (3): 209-12, 2002.12003684 21999114
Breitbart W, Tremblay A, Gibson C: An open trial of olanzapine for the treatment of delirium in hospitalized cancer patients. Psychosomatics 43 (3): 175-82, 2002 May-Jun.12075032 22070548
Breitbart W, Marotta R, Platt MM, et al.: A double-blind trial of haloperidol, chlorpromazine, and lorazepam in the treatment of delirium in hospitalized AIDS patients. Am J Psychiatry 153 (2): 231-7, 1996.8561204 96155935
US Food and Drug Administration: Information for Healthcare Professionals: Haloperidol (marketed as Haldol, Haldol Decanoate and Haldol Lactate). Rockville, Md: Food and Drug Administration, Center for Drug Evaluation and Research, 2007. Available online (https://wayback.archive-it.org/7993/20170722191309/https://www.fda.gov/Drugs/DrugSafety/PostmarketDrugSafetyInformationforPatientsandProviders/DrugSafetyInformationforHeathcareProfessionals/ucm085203.htm). Last accessed January 3, 2018.
Hassaballa HA, Balk RA: Torsade de pointes associated with the administration of intravenous haloperidol. Am J Ther 10 (1): 58-60, 2003 Jan-Feb.12522522
Khojainova N, Santiago-Palma J, Kornick C, et al.: Olanzapine in the management of cancer pain. J Pain Symptom Manage 23 (4): 346-50, 2002.11997204 21993054
Kim SW, Yoo JA, Lee SY, et al.: Risperidone versus olanzapine for the treatment of delirium. Hum Psychopharmacol 25 (4): 298-302, 2010.20521319
Kim KY, Bader GM, Kotlyar V, et al.: Treatment of delirium in older adults with quetiapine. J Geriatr Psychiatry Neurol 16 (1): 29-31, 2003.12641370
Boettger S, Friedlander M, Breitbart W, et al.: Aripiprazole and haloperidol in the treatment of delirium. Aust N Z J Psychiatry 45 (6): 477-82, 2011.21563866
Morita T, Otani H, Tsunoda J, et al.: Successful palliation of hypoactive delirium due to multi-organ failure by oral methylphenidate. Support Care Cancer 8 (2): 134-7, 2000.10739361 20201968
Platt MM, Breitbart W, Smith M, et al.: Efficacy of neuroleptics for hypoactive delirium. J Neuropsychiatry Clin Neurosci 6 (1): 66-7, 1994 Winter.7908548 94198590
Gagnon B, Low G, Schreier G: Methylphenidate hydrochloride improves cognitive function in patients with advanced cancer and hypoactive delirium: a prospective clinical study. J Psychiatry Neurosci 30 (2): 100-7, 2005.15798785
Fainsinger RL, Tapper M, Bruera E: A perspective on the management of delirium in terminally ill patients on a palliative care unit. J Palliat Care 9 (3): 4-8, 1993 Autumn.7903694 94096207
Caraceni A: Delirium in palliative medicine. European Journal of Palliative Care 2 (2): 62-7, 1995.
MacLeod AD: The management of delirium in hospice practice. European Journal of Palliative Care 4 (4): 116-20, 1997.
Bergevin P, Bergevin RM: Recognizing delirium in terminal patients. Am J Hosp Palliat Care 13 (2): 28-9, 1996 Mar-Apr.8716325
Twycross RG: Symptom control: The problem areas. Palliat Med 7 (Suppl 1): 1-8, 1993.
Rietjens JA, van Zuylen L, van Veluw H, et al.: Palliative sedation in a specialized unit for acute palliative care in a cancer hospital: comparing patients dying with and without palliative sedation. J Pain Symptom Manage 36 (3): 228-34, 2008.18411017
Cherny NI, Portenoy RK: Sedation in the management of refractory symptoms: guidelines for evaluation and treatment. J Palliat Care 10 (2): 31-8, 1994 Summer.8089815
Macleod AD: Use of sedatives in palliative medicine. Palliat Med 11 (6): 493-4, 1997.9519175
Morita T, Tsuneto S, Shima Y: Definition of sedation for symptom relief: a systematic literature review and a proposal of operational criteria. J Pain Symptom Manage 24 (4): 447-53, 2002.12505214
Fainsinger RL: Treatment of delirium at the end of life: Medical and ethical issues. In: Portenoy RK, Bruera E, eds.: Topics in Palliative Care. Volume 4. Oxford University Press, 2000, pp 261-77.
Fainsinger RL, Waller A, Bercovici M, et al.: A multicentre international study of sedation for uncontrolled symptoms in terminally ill patients. Palliat Med 14 (4): 257-65, 2000.10974977
Morita T, Chinone Y, Ikenaga M, et al.: Ethical validity of palliative sedation therapy: a multicenter, prospective, observational study conducted on specialized palliative care units in Japan. J Pain Symptom Manage 30 (4): 308-19, 2005.16256895
Morita T, Chinone Y, Ikenaga M, et al.: Efficacy and safety of palliative sedation therapy: a multicenter, prospective, observational study conducted on specialized palliative care units in Japan. J Pain Symptom Manage 30 (4): 320-8, 2005.16256896
Chater S, Viola R, Paterson J, et al.: Sedation for intractable distress in the dying--a survey of experts. Palliat Med 12 (4): 255-69, 1998.9743824
Fainsinger RL, Landman W, Hoskings M, et al.: Sedation for uncontrolled symptoms in a South African hospice. J Pain Symptom Manage 16 (3): 145-52, 1998.9769616 98441752
Fainsinger RL, De Moissac D, Mancini I, et al.: Sedation for delirium and other symptoms in terminally ill patients in Edmonton. J Palliat Care 16 (2): 5-10, 2000 Summer.10887726
Elsayem A, Curry Iii E, Boohene J, et al.: Use of palliative sedation for intractable symptoms in the palliative care unit of a comprehensive cancer center. Support Care Cancer 17 (1): 53-9, 2009.18461370
Caraceni A, Zecca E, Martini C, et al.: Palliative sedation at the end of life at a tertiary cancer center. Support Care Cancer 20 (6): 1299-307, 2012.21766162
Fainsinger RL, Bruera E: Is this opioid analgesic tolerance? J Pain Symptom Manage 10 (7): 573-7, 1995.8537701 96072136
Fainsinger RL: Use of sedation by a hospital palliative care support team. J Palliat Care 14 (1): 51-4, 1998 Spring.9575715 98236628
de Stoutz ND, Tapper M, Fainsinger RL: Reversible delirium in terminally ill patients. J Pain Symptom Manage 10 (3): 249-53, 1995.7629419
Dunlop RJ: Is terminal restlessness sometimes drug induced? Palliat Med 3: 65-6, 1989.
Rousseau PC: Palliative sedation. Am J Hosp Palliat Care 19 (5): 295-7, 2002 Sep-Oct.12269773
Cowan JD, Palmer TW: Practical guide to palliative sedation. Curr Oncol Rep 4 (3): 242-9, 2002.11937015
Ashby M: Palliative care, death causation, public policy and the law. Progress in Palliative Care 6 (3): 69-77, 1998.
Cherny NI: Commentary: sedation in response to refractory existential distress: walking the fine line. J Pain Symptom Manage 16 (6): 404-6, 1998.9879166
Rosen EJ: Commentary: a case of "terminal sedation" in the family. J Pain Symptom Manage 16 (6): 406-7, 1998.9879167
van Dooren S, van Veluw HT, van Zuylen L, et al.: Exploration of concerns of relatives during continuous palliative sedation of their family members with cancer. J Pain Symptom Manage 38 (3): 452-9, 2009.19559563

## Changes to This Summary (01/04/2016)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® - NCI's Comprehensive Cancer Database (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of delirium. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Delirium are:

- Mary K. Buss, MD, MPH (Beth Israel Deaconess Medical Center)
- Diane Von Ah, PhD, RN, FAAN (The Ohio State University)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Delirium. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/memory/delirium-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389173]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).